# Smoking in Cancer Care (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the risks of continued smoking in cancer patients and ways to stop. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

This summary is about cancer patients who smoke, why it is important to stop smoking, and ways to get help. It includes information on the following:

- Risks of smoking in cancer patients, including second cancers.
- Counseling to help cancer patients quit smoking.
- Treatment with drugs to help cancer patients quit smoking.

## Smoking and Cancer Risk

Key Points for This Section
- Smoking increases the risk of cancer.
- Lung cancer and other types of cancers are linked to tobacco use.

### Smoking increases the risk of cancer.

Smoking is the leading cause of cancer in the United States. Lung cancer is the leading cause of cancer death in both men and women in the United States. If you smoke, your risk of cancer can be up to 10 times higher than it is for a person who never smoked.

Smoking increases cancer risk by:

- Causing changes in genes.
- Damaging the lungs.
- Making the immune system weak.

Your risk depends on how much and how long you have smoked.

### Lung cancer and other types of cancers are linked to tobacco use.

Cancer risks linked to tobacco use include the following:

- Lung cancer and head and neck cancers are linked to tobacco use.
- People who started smoking before age 30 and have been smoking for a long time have a high risk of colorectal cancer.
- In smokers diagnosed with cancer, the cancer is more likely to have already spread.

See the following for more information:

- A Report of the Surgeon General: How Tobacco Smoke Causes Disease (http://www.cdc.gov/tobacco/data_statistics/sgr/2010/consumer_booklet/pdfs/consumer.pdf)
- Lung Cancer Prevention

## Risks of Smoking During Cancer Treatment

Key Points for This Section
- Quitting smoking is helpful after cancer is diagnosed.
- If you keep smoking, you may not respond well to treatment.
- Cancer patients who keep smoking increase their risk of having a second cancer.

### Quitting smoking is helpful after cancer is diagnosed.

Studies have found that smokers who quit are more likely to recover from cancer than are patients who continue to smoke.

### If you keep smoking, you may not respond well to treatment.

If you continue to smoke during cancer treatment, you may not respond to treatment as well as patients who do not smoke. Also, you may have worse side effects from treatment. For example, patients who are given radiation therapy for laryngeal cancer are less likely to get their voice back to normal if they keep smoking.

Wounds from surgery heal more slowly in patients who keep smoking. Studies have found that prostate cancer patients who keep smoking have a higher risk of the cancer coming back, and of death from prostate cancer. However, prostate cancer patients who quit smoking for 10 years or longer lower their risk of death to about the same as nonsmokers.

### Cancer patients who keep smoking increase their risk of having a second cancer.

You have a higher risk of a second cancer if you keep smoking, whether you have a cancer that is smoking-related or not smoking-related. The risk of a second cancer may last for up to 20 years, even if the first cancer has been treated and is in remission (signs and symptoms of cancer have disappeared). Patients with oral and pharyngeal cancer who smoke have a high risk of a second cancer, but the risk is much less after 5 years of not smoking.

## Counseling to Help You Quit Smoking

Key Points for This Section
- Counseling may make it easier for you to quit smoking.
- It may take more than one try to quit smoking completely.
- You can find help online.

### Counseling may make it easier for you to quit smoking.

It is not easy to quit smoking and research has shown that people are more likely to quit if they have help. Mood changes are common in cancer patients and in people who smoke or are trying to quit smoking. Talk with your doctor if you have feelings of depression. Your doctor can offer counseling or other ways to help you quit smoking and treat depression when needed.

Not all smokers are motivated to quit. If you are not motivated to quit smoking, your doctor may be able to help you become motivated.

Your doctor or other health care professional may take the following steps to help you quit:

- Ask you about your smoking habits at every visit.
- Advise you to quit smoking.
- Help you with a plan to quit smoking by:
  - Setting a date to quit smoking.
  - Giving you self-help materials.
  - Recommending drug treatment.
- Plan follow-up visits with you.

### It may take more than one try to quit smoking completely.

When you first quit smoking, it is common to start again. There will be many stressful times that will make you want to smoke. Counseling can help you find ways to handle the stress other than by smoking. It may take more than a year to quit smoking completely, even when you are motivated.

### You can find help online.

The following websites may be helpful:

- Smokefree.gov: Information about quitting smoking.
- Clearing the Air: Quit Smoking Today (http://smokefree.gov/sites/default/files/pdf/clearing-the-air-accessible.pdf): Tips and advice on how to start a smoke-free life.
- BeTobaccoFree.gov (http://betobaccofree.hhs.gov/index.html): Information about the harmful health effects of smoking and tools for quitting.

## Treatment With Medicine to Help You Quit Smoking

Key Points for This Section
- There are different ways to stop smoking.
- Nicotine replacement therapy may help you quit smoking.
- Other medicines may also help you quit smoking.

### There are different ways to stop smoking.

Different ways to stop smoking work for different patients. Some smokers can quit with the help of counseling, while others may need medicines to help them quit.

### Nicotine replacement therapy may help you quit smoking.

When you are trying to quit smoking, nicotine replacement therapy may help you with withdrawal symptoms, such as:

- Feeling depressed.
- Feeling nervous.
- Having trouble thinking clearly.
- Having trouble sleeping.

Nicotine replacement products include the following:

- Nicotine inhalers.
- Nicotine gum.
- Nicotine lozenges.
- Nicotine patches.

Talk with your doctor before you start any form of treatment. Nicotine replacement products can cause problems in some people, especially:

- Women who are pregnant or breastfeeding.
- Patients younger than 18 years.
- Patients who have the following conditions:
  - Heart disease or an irregular heartbeat.
  - High blood pressure not controlled with medicine.
  - Esophagitis or peptic ulcer disease.
  - Diabetes treated with insulin.
  - Depression or asthma treated with prescription medicines.
- Patients who keep smoking, chewing tobacco, or using snuff.

### Other medicines may also help you quit smoking.

The following drugs, which do not have nicotine in them, are used to help people quit smoking:

- Varenicline (also called Chantix). Varenicline is a drug approved by the Food and Drug Administration (FDA) that acts the same way nicotine acts in the brain. In June 2011, the FDA warned that varenicline may increase the risk of heart problems in patients with cardiovascular disease. Other side effects of varenicline include the following:
  - Nausea.
  - Headaches.
  - Problems sleeping.
  - Abnormal dreams.
  - Gas.
  - Upset stomach.
  - Constipation.
  - Feeling very tired or sleepy.
- Bupropion (also called Zyban). Bupropion is an antidepressant approved by the FDA to help people quit smoking.
- Fluoxetine (also called Prozac). Fluoxetine is an antidepressant and studies have shown that it can help people quit smoking.

These medicines lessen nicotine craving and nicotine withdrawal symptoms.

Fluoxetine causes an increased risk of suicide in adults younger than 25 years. In July 2009, the FDA warned that varenicline and bupropion may cause depression, suicide, and other mental health changes in patients who take them. These changes include:

- Extreme mood changes.
- Psychosis (not being able to recognize what is real or relate to others).
- Hallucinations (a sight, sound, smell, taste, or touch that the patient believes to be real but is not real).
- Paranoia (an extreme fear or distrust of others).
- Delusions (believing something that is not true).
- Homicidal thoughts (thoughts about killing others).
- Hostility (having or showing unfriendly feelings).
- Agitation (inability to relax or be still).
- Anxiety (feelings of fear, dread, and uneasiness that may be a reaction to stress).
- Panic (sudden extreme anxiety or fear that may cause irrational thoughts or actions).
- Suicidal thoughts and attempted suicide.

These mental health changes may occur in patients with or without a history of psychiatric illness and it is not known if nicotine withdrawal is a part of this. (See the Depression and Suicide section in the PDQ summary on Pediatric Supportive Care.)

All patients taking these medicines, especially those with a history of psychiatric illness, should be followed closely by a doctor.

The FDA recommends that the important health benefits of quitting smoking be weighed against the small but serious risk of problems with the use of these drugs.

## To Learn More About Smoking in Cancer Care

For more information about smoking in cancer care, see the following:

- Lung Cancer Prevention
- A Report of the Surgeon General: How Tobacco Smoke Causes Disease (http://www.cdc.gov/tobacco/data_statistics/sgr/2010/consumer_booklet/pdfs/consumer.pdf)
- Smokefree.gov
- Quit Guide (http://www.smokefree.gov/quit-guide.aspx)
- Clearing the Air: Quit Smoking Today (http://smokefree.gov/sites/default/files/pdf/clearing-the-air-accessible.pdf)
- BeTobaccoFree.gov (http://betobaccofree.hhs.gov/index.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (http://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the risks of continued smoking in cancer patients and ways to stop. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (http://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials are listed in PDQ and can be found online at NCI's website (http://www.cancer.gov/about-cancer/treatment/clinical-trials). Many cancer doctors who take part in clinical trials are also listed in PDQ. For more information, call the Cancer Information Service 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Smoking in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: http://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/smoking-cessation-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389200]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (http://visualsonline.cancer.gov/). Visuals Online is a collection of more than 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (http://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (http://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (http://www.cancer.gov/contact/email-us).